# Pediatric Supportive Care (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about supportive care issues related to treatment in children and adolescents. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Overview

Improvements in survival for all childhood cancers combined have increased over time. The 5-year survival rate during the period 2011 to 2017 was 85% for children and 86% for adolescents, though rates varied widely depending on cancer type, patient age, and other factors.[1] With these improved outcomes, the focus of research and expectations of patients, parents, and health care providers has increasingly emphasized reducing the burden of cancer and its treatment for these children during treatment, after the completion of treatment, and as adult survivors.

Cancer treatment for children differs in many ways from treatment for adults. Some of the principal differences include the following:

- Intensity. In general, treatment of childhood cancer is more intense. Because the dose-limiting toxicities of most chemotherapy and radiation treatments are generally reached at higher doses, more-intensive chemotherapy and radiation therapy are feasible for children than would be possible for adults.
- Toxicity. Some of the toxicities of treatment have a much more significant and lasting effect on children than on adults because of the active development of nearly all organ systems during childhood and adolescence.
- Supportive Care. Developmental differences extend to the types of supportive care that children may receive. Medications that represent standards of care for adult cancer supportive care may be contraindicated for children because of adverse toxicities that are associated with specific periods of childhood development.

Fundamental to these differences is the clear recognition that children are not small adults and that even the term children is not all-encompassing. Treatment and supportive care require different approaches across the spectrum from newborn through young adult age groups, and the outcomes of both cancer survivorship (control of disease) and quality of survivorship (impact of toxicities) differ with the age of a child at the time of treatment.

Equally important is the recognition that treatment of childhood cancer inevitably occurs in the context of a family. Frequently, the impact of an adult’s cancer treatment focuses on one or two key adults in the cancer patient’s life. In childhood cancer, the effects are often felt by more individuals, including one or both parents, one or more siblings who are themselves children or adolescents, grandparents, aunts and uncles, teachers, friends, and other individuals who may be directly involved in the care or life experience of the child. Furthermore, because children are not considered legally competent exclusively on the basis of age, most decisions about cancer treatment are made by proxy. Instead of children making decisions about their own care, their parents or guardians make these decisions for them. The large number of people involved, legal issues related to decision making about minors by others, and ethical concerns about informed consent and assent involving children add extra layers to the complexity of treatment for children.

In this pediatric supportive care summary, issues specifically related to children and adolescents will be reviewed. Evidence and recommendations may differ significantly from information provided about supportive care for adults.

Refer to the following sections of this summary for more information:

- Siblings subsection in the Families section.
- Psychological Adjustment section.
- End of Life section.

The following topics will be added to this summary:

- Growth and development.
- School issues/cognition.

Refer to the Prevalence of Late Effects in Childhood Cancer Survivors section in the PDQ summary on Late Effects of Treatment for Childhood Cancer for pediatric-specific information about cancer survivorship.

### References

American Cancer Society: Cancer Facts and Figures 2022. American Cancer Society, 2022. Available online (https://www.cancer.org/content/dam/cancer-org/research/cancer-facts-and-statistics/annual-cancer-facts-and-figures/2022/2022-cancer-facts-and-figures.pdf). Last accessed October 7, 2022.

## Psychological Adjustment

Treatment of childhood cancer is a highly stressful experience, challenging and disruptive to children and their family members. It is therefore assumed that children undergoing cancer treatment are at significantly higher risk for depression, anxiety, and other indicators of psychological distress. However, the empirical evidence to support this assumption is weak. Overall, studies suggest that children treated for cancer and children who are long-term survivors of cancer experience few significant psychological adjustment problems.[1-3]

There is evidence that children experience distress during the cancer treatment process. Distress appears to be most significant early in therapy, typically when frequent hospitalizations are necessary, with a pattern of less distress occurring over time.[4,5] One group of 39 families of children newly diagnosed with leukemia was compared with a group of 49 families of healthy children. While parents and the children treated for cancer reported higher levels of distress immediately following diagnosis, these levels of distress decreased over 4 years of follow-up, and there were no significant differences in psychological distress compared with the healthy comparison cohort.[4] Similar findings have been reported across cultures.[6]

The validity of obtaining accurate reports of psychologic distress in this population has been questioned. One investigation of whether psychological defensiveness might mask the reporting of depression and other symptoms of psychological distress studied 107 children treated for cancer and 422 healthy controls who completed a series of measures of depression and anxiety.[7][Level of evidence: II] Children treated for cancer reported significantly fewer depressive symptoms than did healthy children, and defensive style was not related to report of depression. Another study of 205 children and 321 parents of children with either cancer, asthma, or no significant health problem also found no significant levels of depression in children treated for cancer. However, parents of children with cancer attributed more cheerful characteristics to their children than did the parents of children in the other groups.[8][Level of evidence: II]

Studies have reported no differences from controls on the following measures:

- Self-esteem.[9,10]
- Hopefulness.[9]
- Depression, anxiety, or loneliness.[10]

One group of investigators [10] found that teachers perceived children with cancer as more social and less aggressive, and peers rated them as less aggressive and having greater social acceptance than other peers. It may make a difference who is reporting: parents of children report more limitations in their children than the children themselves report,[11] although children do report lower satisfaction with athletic competence than do their peers.[10]

### Differences in Adjustment

Diagnosis and type of treatment appear to make a difference in adjustment in specific subgroups of children with cancer.[12]

#### Solid tumors

Children treated for solid tumors not involving the central nervous system (CNS) appear to have minimal psychological distress, and this is maintained after treatment.[13]

#### Acute lymphoblastic leukemia or lymphoma

Children treated for acute lymphoblastic leukemia (ALL) or lymphoma report poorer emotional functioning, cognitive skills, autonomy, and family interaction than do children treated for non-CNS solid tumors.[13]

#### CNS tumors

For children whose disease or treatment directly involves the CNS, the risk of developing social and emotional problems appears much greater. Children with brain tumors are seen by their peers as being sick, fatigued, absent from school, and socially isolated and are less likely to be endorsed as friends by their peers.[14]

#### Stem cell transplantation

Children receiving hematopoietic stem cell transplantation (HSCT) are likely to experience declines in both social competence and self-concept over time.[15]

#### Ethnicity

Ethnicity can also play a role in quality of life.[16]

### Family Factors

Family factors appear to play a large role in child adjustment, with family cohesion and expressiveness associated with better outcomes and family conflict associated with poorer outcomes, particularly for children experiencing more-intensive treatment.[15] Younger (pre-school) children are more likely to experience higher levels of externalizing behavior problems (e.g., aggression, impulsivity, or disruptive behavior) during treatment than do adolescents, but overall health-related quality of life (HRQL) reported by parents is better for younger children than for adolescents.[17] Age may also serve as a mediator in the approach to coping and perceived level of control experienced by children being treated for cancer. While one group of researchers found that children with cancer reported significantly more use of avoidant coping strategies than did healthy children, regardless of age,[18] another group found that the relationship between perceived control and problem-focused or emotion-focused coping (problem-focused coping related to higher appraisals of control) was mediated by age.[19] A limited number of studies has been conducted in this area, and there are likely a number of additional mediators of adjustment-coping relationships that have not yet been examined.

### Childhood Cancer Survivor Study

The Childhood Cancer Survivor Study (CCSS) is a large, ongoing, multicenter study of more than 10,000 long-term survivors of childhood cancer and a comparison sibling control population. Using extensive survey methodology that links reports of current functioning to diagnosis, types of treatment, and other health factors associated with cancer and its treatment, the CCSS has selectively looked at long-term adjustment in large samples of young adults treated for similar childhood cancers. In one CCSS report, 2,778 survivors of solid tumors diagnosed in childhood and 2,925 siblings were surveyed using a standardized long-term follow-up questionnaire. Symptoms associated with depression, somatization, and anxiety were reported, along with demographic, health, and medical information. Few, if any, symptoms of psychological distress were reported by the cancer survivors, although survivors of solid-tumor cancers reported higher levels of global distress than did their siblings. There were no differences on these measures from population norms. For both cancer survivors and their siblings, female gender, lower education and income attainment, perceived poor health status, and reports of current health problems were all associated with higher levels of psychological distress symptoms.[20][Level of evidence: II]

Positive findings also have been reported by the CCSS for young adults who are survivors of leukemias and lymphomas. Follow-up questionnaires about psychological adjustment were administered to 5,736 young adult survivors of leukemia, non-Hodgkin lymphoma, and Hodgkin disease and to 2,565 adult siblings. Survivors reported higher levels of depressive symptoms and somatic distress than did siblings, but scores for neither group fell within the clinically significant range for the general population. Sociodemographic factors such as gender and socioeconomic status were associated with reports of depressive symptoms, regardless of treatment status. The only disease-related factor associated with psychological distress was intensive chemotherapy, which was associated with an increase in somatic complaints.[2][Level of evidence: II] Similar outcomes were reported for survivors of brain cancers. Brain tumor survivors reported higher levels of depressive symptomatology than did siblings, but the rates for both groups were similar to rates for the general population.[3][Level of evidence: II] A summary of the main psychosocial outcomes reported by the CCSS is available.[21][Level of evidence: II] Other reports from the CCSS address alcohol consumption,[22] the role of physical limitations on HRQL,[23][Level of evidence: II] fatigue, and sleep.[24]

### Depression and Suicide

Young adult survivors of childhood cancer may have an elevated risk for suicidality. A report from Eastern Europe compared the responses of 228 long-term survivors of childhood cancer with those of 127 controls to the Center for Epidemiologic Studies Depression Scale (CES-D) and the Suicidal Ideation and Behaviour Questionnaire. The rates of depressive symptoms reported by the childhood cancer survivors were three times the rates reported by the controls, with 13% indicating some level of suicidal ideation.[25] Similarly, 226 adult survivors of childhood cancer seen in a survivor clinic completed the Short Form-36 (SF-36), the Beck Depression Inventory (BDI), and suicide items from the Symptom Checklist-90-Revised (SCL-90-R) and the Beck Scale for Suicide Ideation (BSS). The measures assessed whether the survivors had ever attempted suicide or whether they had experienced significant suicidal ideation within the past week; 29 participants (12.83%) reported suicidality. Suicidality was associated with younger age at diagnosis, longer time since diagnosis, cranial radiation therapy, a diagnosis of leukemia, pain, and concerns about physical appearance. Current physical condition, including pain, was associated with suicidality.[26][Level of evidence: II] These studies represent relatively small samples with small comparison groups and may reflect a reporting bias represented in individuals who actively attend follow-up clinics. Nonetheless, while these results are inconsistent with other findings related to psychological distress, they do suggest the need for ongoing monitoring and surveillance of adults who are survivors of childhood cancer.

Significant concern about the potential for suicide as a side effect of selective serotonin reuptake inhibitors (SSRIs) has led the U.S. Food and Drug Administration (FDA) to issue a caution about their use that includes the importance of careful monitoring of potential risks.[27] Before this FDA Health Advisory was issued, clinical experience and the results of small clinical trials suggested that antidepressants can be safely administered to adult cancer patients, although there are no controlled clinical trials to support this position. The risk/benefit ratio for use of SSRIs may not be as favorable for children and adolescents. Several multicenter, double-blind, randomized, placebo-controlled clinical trials using SSRIs with children and adolescents with major depressive disorder but not cancer found modest improvements for fluoxetine,[28,29] paroxetine,[30] and sertraline.[31][Level of evidence: I] Balancing these improvements were reports of serious adverse events that included worsening of psychiatric symptoms, increased suicidal ideation and gestures, increased conduct problems or hostility with paroxetine,[30] and suicide and suicide attempts with sertraline.[31][Level of evidence: I]

None of these clinical trials have included or focused on children and adolescents being treated for cancer. Risk/benefit concerns have reached the level of international regulatory concern. The Medicines and Healthcare Products Regulatory Agency of Great Britain has recommended that most of the drugs in the SSRI category not be used with children and adolescents,[32] and the FDA raised similar concerns in a Talk Paper and subsequently issued a “black box” warning.[27] A major meta-analysis published in the Journal of the American Medical Association reanalyzed the data from the child and adolescent studies [33][Level of evidence: I] (including seven studies not included in the initial meta-analysis [34][Level of evidence: I]) using a random-effects model. While this reanalysis found an overall increased risk of suicidal ideation/suicide attempt consistent with the initial meta-analysis, the pooled risk differences were found to be smaller and statistically insignificant.[33] Furthermore, another study examining the U.S. and Dutch data suggests a drop in SSRI prescriptions for children and adolescents and a simultaneous increase in suicide rates in this patient population since the FDA Health Advisory was issued.[35]

In summary, the risk/benefit equation favors appropriate use of antidepressants with careful monitoring for suicidality.[36] The British Committee on Safety of Medicines considered only one of the SSRIs (fluoxetine) to have a favorable balance of risks and benefits, but it is only considered beneficial in approximately one in ten patients.[37] Consistent with this finding, age-stratified analyses of the child and adolescent studies found that for children younger than 12 years who have major depression, only fluoxetine showed benefit over placebo.[33]

As noted, none of the children or adolescents in these studies had cancer, so there are no reports available that address whether there are additional increased risks of adverse events associated with the use of SSRIs following exposure to different chemotherapeutic agents and/or CNS radiation treatment. Frontline, alternative, effective, behavioral, and pharmacologic treatments for depression should be used for children and adolescents being treated for cancer. However, if the risks of depression are significant and SSRIs are considered, consultation with a child psychiatrist or neurologist is essential, and close monitoring of potential adverse events is crucial.

### Post-traumatic Stress Disorder and Post-traumatic Stress Symptoms

The cancer treatment experience may be considered a significant traumatic event, given the nature of diagnosis, the number of invasive and painful procedures, and the often long hospitalizations that children and their families must experience. On the basis of this exposure model, a number of studies have examined whether children treated for cancer are at a significantly higher risk for the development of symptoms of post-traumatic stress disorder (PTSD). The results of these studies have been mixed.[38] One study reported that children and adolescents who were undergoing treatment reported some symptoms of post-traumatic stress; however, for most children these symptoms did not meet the criteria for a diagnosis of PTSD, and the symptoms diminished over time.[39][Level of evidence: II]

Other studies suggest that survivors of childhood cancer have an increased risk for post-traumatic stress symptoms and PTSD after treatment is finished. In a study of 78 adults aged 18 to 41 years who had been treated for childhood cancer, 20.5% met the criteria for a diagnosis of PTSD at some time since the end of their treatment. Clinically significant events of intrusive symptoms (9%) and avoidant symptoms (16.7%) were reported in the sample, and the symptoms were associated with elevated reports of anxiety and other measures of psychologic distress.[40][Level of evidence: II] Survivors who report higher levels of uncertainty about their disease and future appear to be more likely to have elevated reports of post-traumatic stress symptoms.[41][Level of evidence: II][42] A study of 182 adolescent and young adult cancer survivors who were more than 5 years from diagnosis and more than 2 years from completion of cancer treatment also found that 16% met the criteria for PTSD. A relationship between PTSD and higher levels of other psychological problems was also reported.[43] When survivors meet the criteria for PTSD, they are more likely to experience depression and negative affect, lower satisfaction with life, and poorer reported HRQL, as well as difficulty performing developmental tasks.[44][Level of evidence: II]

### References

Eiser C, Hill JJ, Vance YH: Examining the psychological consequences of surviving childhood cancer: systematic review as a research method in pediatric psychology. J Pediatr Psychol 25 (6): 449-60, 2000.10980049
Zebrack BJ, Zeltzer LK, Whitton J, et al.: Psychological outcomes in long-term survivors of childhood leukemia, Hodgkin's disease, and non-Hodgkin's lymphoma: a report from the Childhood Cancer Survivor Study. Pediatrics 110 (1 Pt 1): 42-52, 2002.12093945
Zebrack BJ, Gurney JG, Oeffinger K, et al.: Psychological outcomes in long-term survivors of childhood brain cancer: a report from the childhood cancer survivor study. J Clin Oncol 22 (6): 999-1006, 2004.15020603
Sawyer M, Antoniou G, Toogood I, et al.: Childhood cancer: a 4-year prospective study of the psychological adjustment of children and parents. J Pediatr Hematol Oncol 22 (3): 214-20, 2000 May-Jun.10864052
Varni JW, Katz E: Stress, social support and negative affectivity in children with newly diagnosed cancer: a prospective transactional analysis. Psychooncology 6 (4): 267-78, 1997.9451746
Chao CC, Chen SH, Wang CY, et al.: Psychosocial adjustment among pediatric cancer patients and their parents. Psychiatry Clin Neurosci 57 (1): 75-81, 2003.12519458
Phipps S, Srivastava DK: Approaches to the measurement of depressive symptomatology in children with cancer: attempting to circumvent the effects of defensiveness. J Dev Behav Pediatr 20 (3): 150-6, 1999.10393071
Grootenhuis MA, Last BF, van der Wel M, et al.: Parents' attribution of positive characteristics to their children with cancer. Psychol Health 13: 67-81, 1998.
Ritchie MA: Self-esteem and hopefulness in adolescents with cancer. J Pediatr Nurs 16 (1): 35-42, 2001.11247523
Noll RB, Gartstein MA, Vannatta K, et al.: Social, emotional, and behavioral functioning of children with cancer. Pediatrics 103 (1): 71-8, 1999.9917442
Levi RB, Drotar D: Health-related quality of life in childhood cancer: discrepancy in parent-child reports. Int J Cancer Suppl 12: 58-64, 1999.10679872
Armstrong FD, Toledano SR, Miloslavich K, et al.: The Miami pediatric quality of life questionnaire: parent scale. Int J Cancer Suppl 12: 11-7, 1999.10679865
Calaminus G, Weinspach S, Teske C, et al.: Quality of life in children and adolescents with cancer. First results of an evaluation of 49 patients with the PEDQOL questionnaire. Klin Padiatr 212 (4): 211-5, 2000 Jul-Aug.10994553
Vannatta K, Gartstein MA, Short A, et al.: A controlled study of peer relationships of children surviving brain tumors: teacher, peer, and self ratings. J Pediatr Psychol 23 (5): 279-87, 1998.9782676
Phipps S, Mulhern RK: Family cohesion and expressiveness promote resilience to the stress of pediatric bone marrow transplant: a preliminary report. J Dev Behav Pediatr 16 (4): 257-63, 1995.7593661
Casillas JN, Zebrack BJ, Zeltzer LK: Health-related quality of life for Latino survivors of childhood cancer. J Psychosoc Oncol 24 (3): 125-45, 2006.17088244
Barrera M, Wayland LA, D’Agostino NM, et al.: Developmental differences in psychological adjustment and health-related quality of life in pediatric cancer patients. Child Health Care 32 (3): 215-32, 2003.
Phipps S, Fairclough D, Mulhern RK: Avoidant coping in children with cancer. J Pediatr Psychol 20 (2): 217-32, 1995.7760221
Sorgen KE, Manne SL: Coping in children with cancer: examining the goodness-of-fit hypothesis. Child Health Care 31 (3): 191-207, 2002.
Zebrack BJ, Zevon MA, Turk N, et al.: Psychological distress in long-term survivors of solid tumors diagnosed in childhood: a report from the childhood cancer survivor study. Pediatr Blood Cancer 49 (1): 47-51, 2007.16755550
Zeltzer LK, Lu Q, Leisenring W, et al.: Psychosocial outcomes and health-related quality of life in adult childhood cancer survivors: a report from the childhood cancer survivor study. Cancer Epidemiol Biomarkers Prev 17 (2): 435-46, 2008.18268128
Lown EA, Goldsby R, Mertens AC, et al.: Alcohol consumption patterns and risk factors among childhood cancer survivors compared to siblings and general population peers. Addiction 103 (7): 1139-48, 2008.18554347
Ness KK, Gurney JG, Zeltzer LK, et al.: The impact of limitations in physical, executive, and emotional function on health-related quality of life among adult survivors of childhood cancer: a report from the Childhood Cancer Survivor Study. Arch Phys Med Rehabil 89 (1): 128-36, 2008.18164342
Mulrooney DA, Ness KK, Neglia JP, et al.: Fatigue and sleep disturbance in adult survivors of childhood cancer: a report from the childhood cancer survivor study (CCSS). Sleep 31 (2): 271-81, 2008.18274275
Svetičič J, Jereb B, Bucik V, et al.: Suicidal behaviour in long-term survivors of childhood cancer. [Abstract] Psychiatr Danub 18 (Suppl 1): 39-40, 2006.
Recklitis CJ, Lockwood RA, Rothwell MA, et al.: Suicidal ideation and attempts in adult survivors of childhood cancer. J Clin Oncol 24 (24): 3852-7, 2006.16921037
U.S. Food and Drug Administration: Antidepressant Use in Children, Adolescents, and Adults. Rockville, Md: Food and Drug Administration, Center for Drug Evaluation and Research, 2007. Available online (https://wayback.archive-it.org/7993/20171104181137/https://www.fda.gov/Drugs/DrugSafety/InformationbyDrugClass/UCM096273). Last accessed August 26, 2021.
Emslie GJ, Rush AJ, Weinberg WA, et al.: A double-blind, randomized, placebo-controlled trial of fluoxetine in children and adolescents with depression. Arch Gen Psychiatry 54 (11): 1031-7, 1997.9366660
Emslie GJ, Heiligenstein JH, Wagner KD, et al.: Fluoxetine for acute treatment of depression in children and adolescents: a placebo-controlled, randomized clinical trial. J Am Acad Child Adolesc Psychiatry 41 (10): 1205-15, 2002.12364842
Keller MB, Ryan ND, Strober M, et al.: Efficacy of paroxetine in the treatment of adolescent major depression: a randomized, controlled trial. J Am Acad Child Adolesc Psychiatry 40 (7): 762-72, 2001.11437014
Wagner KD, Ambrosini P, Rynn M, et al.: Efficacy of sertraline in the treatment of children and adolescents with major depressive disorder: two randomized controlled trials. JAMA 290 (8): 1033-41, 2003.12941675
Safety Review of Antidepressants Used by Children Completed. London, UK: Medicines and Healthcare Products Regulatory Agency, 2003. Available online (https://webarchive.nationalarchives.gov.uk/20141206064448/http://www.mhra.gov.uk/NewsCentre/Pressreleases/CON002045). Last accessed January 20, 2022.
Bridge JA, Iyengar S, Salary CB, et al.: Clinical response and risk for reported suicidal ideation and suicide attempts in pediatric antidepressant treatment: a meta-analysis of randomized controlled trials. JAMA 297 (15): 1683-96, 2007.17440145
Hammad TA, Laughren T, Racoosin J: Suicidality in pediatric patients treated with antidepressant drugs. Arch Gen Psychiatry 63 (3): 332-9, 2006.16520440
Gibbons RD, Brown CH, Hur K, et al.: Early evidence on the effects of regulators' suicidality warnings on SSRI prescriptions and suicide in children and adolescents. Am J Psychiatry 164 (9): 1356-63, 2007.17728420
Leon AC: The revised black box warning for antidepressants sets a public health experiment in motion. J Clin Psychiatry 68 (7): 1139-41, 2007.17685753
Ramchandani P: Treatment of major depressive disorder in children and adolescents. BMJ 328 (7430): 3-4, 2004.14703522
Bruce M: A systematic and conceptual review of posttraumatic stress in childhood cancer survivors and their parents. Clin Psychol Rev 26 (3): 233-56, 2006.16412542
Phipps S, Long A, Hudson M, et al.: Symptoms of post-traumatic stress in children with cancer and their parents: effects of informant and time from diagnosis. Pediatr Blood Cancer 45 (7): 952-9, 2005.15806541
Hobbie WL, Stuber M, Meeske K, et al.: Symptoms of posttraumatic stress in young adult survivors of childhood cancer. J Clin Oncol 18 (24): 4060-6, 2000.11118467 20569285
Lee YL: The relationships between uncertainty and posttraumatic stress in survivors of childhood cancer. J Nurs Res 14 (2): 133-42, 2006.16741863
Santacroce SJ, Lee YL: Uncertainty, posttraumatic stress, and health behavior in young adult childhood cancer survivors. Nurs Res 55 (4): 259-66, 2006 Jul-Aug.16849978
Rourke MT, Hobbie WL, Schwartz L, et al.: Posttraumatic stress disorder (PTSD) in young adult survivors of childhood cancer. Pediatr Blood Cancer 49 (2): 177-82, 2007.16862538
Schwartz L, Drotar D: Posttraumatic stress and related impairment in survivors of childhood cancer in early adulthood compared to healthy peers. J Pediatr Psychol 31 (4): 356-66, 2006.15788716

## Families

A commonly repeated idea in the cancer community is that cancer is a family disease; this concept is clearly supported by parents and siblings of children who are being treated for cancer. However, the effects of having a child or sibling with cancer are not uniform, either for all family members or at all points in the treatment process, and the literature reflects the variability of each family member’s experience.

### Parents

The diagnosis of childhood cancer represents the start of a period of substantial distress for parents, who report shock, emotional pain, difficulty coping with the necessary procedures performed on their child, rumination, and high levels of information seeking accompanied by a sense of lack of control.[1-3] One study found that all but one participant in a sample of 119 mothers and 52 fathers of children undergoing cancer treatment reported traumatic stress symptoms such as intrusive thoughts, physiologic arousal, and avoidance.[4] When parents of children undergoing treatment (n = 175) were compared with parents of children who had completed treatment (n = 238), symptoms of traumatic stress (intrusion, arousal) were reported more frequently by the parents during the acute phase of treatment than by the parents after treatment, though some parents reported these symptoms after treatment. Some demographic factors may play a role in the degree to which parents experienced significant stress that impairs function. Mothers were more likely to report higher levels of stress than were fathers, and parents with fewer years of formal education and lower socioeconomic status were more likely to experience traumatic stress at any time.[5]

Patterns of parental stress in families of children treated for cancer differ from those in families of children treated for other diseases. In one large study of 675 parents of children who were treated for cancer or diabetes or who were healthy, parents of children with cancer reported significantly higher levels of distress—as indicated in the specific areas of anxiety, physical and psychological distress, depression, and loneliness—than did parents of children with diabetes. Distress levels of parents of patients with cancer matched those in parents of patients with diabetes in measures of uncertainty, loss of control, self-esteem, disease-related fear, and sleep disturbances. Distress levels for parents of children with cancer decreased in intensity with longer time since diagnosis.[6]

At the same time that they are dealing with increased distress, parents of children with cancer report wanting to remain strong and optimistic for their children.[7] One study found no differences in multiple measures of family distress and psychological functioning between families of children with cancer and families with healthy children.[8]

Several factors appear to be predictive of long-term parental adjustment. Better short- and long-term adjustment is experienced by parents who:[9-11]

- Are employed.
- Have social support from family, friends, and health care team members.
- Experience lower levels of parenting stress.
- View their children’s quality of life positively.
- Have positive expectations for treatment outcome.

Factors associated with poorer parental adjustment include the following:[12,13]

- Low parental expectations for positive outcomes.
- Feelings of helplessness, uncertainty, and anxiety.
- Low levels of social support.
- Negative interactions with health care team members.
- Negative assessment of the child’s quality of life.

Race [14] and parent gender [15] may affect the intensity of the effect of these factors on parental functioning. In rare circumstances, the stress of coping with pain, adverse side effects, lack of control or understanding of information or outcomes, and conflicts with health care professionals may lead parents to drop out of cancer treatment for their children.[16]

Most studies suggest that over time, maternal affective distress and perceived stress have been shown to decline, but the perceived burden of caring for a child with cancer remains stable, as do positive characteristics such as parental control, nurturance, and responsiveness.[14] This pattern may be related to the high levels of social support provided at the time of diagnosis, with a gradual decrease in the quantity of support but stable perceived quality of support across all phases of cancer treatment.[15] In general, parents are seen as resilient,[12][Level of evidence: II] but parental loneliness and continued uncertainty may last far beyond the treatment phase if there are ongoing late effects of treatment for the child.[17][Level of evidence: II] A few studies have found that a substantial number of parents (30%–36%) of long-term cancer survivors may experience intense long-term stress-related symptoms that fall below the threshold for a diagnosis of post-traumatic stress disorder (PTSD) but that are nevertheless a significant problem for these parents.[18,19][Level of evidence: II] Symptoms were severe enough that in 20% of families, at least one parent met the criteria for a diagnosis of PTSD.[19]

### Siblings

The challenges of dealing with the diagnosis and treatment of childhood cancer also has implications for the coping and adjustment of siblings. During treatment, siblings of children with cancer may report:

- Higher levels of anxiety and loneliness than experienced by siblings of healthy children.[20][Level of evidence: II]
- Post-traumatic distress symptoms (reported by approximately 50% of siblings).[21][Level of evidence: II]
- Distress about family disruptions and separations.[21]
- Lack of attention associated with the focus of other family members on the ill child.[21]
- Negative interactions with family members.[21]
- Fear of the sibling’s death.[21]

Siblings of children with cancer also report becoming more compassionate and perceiving that their families are drawn closer together through the experience.[22]

The risk to families increases with the following conditions:

- Younger patient age.[22]
- Longer duration of cancer treatment.[20]
- Whether the child with cancer dies.[23]

For siblings of children who undergo allogeneic hematopoietic stem cell transplantation, the risk for anxiety and lower self-esteem is higher for siblings who serve as hematopoietic stem cell donors, while non-donors are at higher risk of developing school problems.[24] Social support programs such as sibling groups [25] or summer camp experiences [26] appear to result in reductions in reported anxiety and improved self-esteem in siblings of children treated for cancer.

### References

McGrath P: Treatment for childhood acute lymphoblastic leukaemia: the fathers' perspective. Aust Health Rev 24 (2): 135-42, 2001.11496455
Levi RB, Marsick R, Drotar D, et al.: Diagnosis, disclosure, and informed consent: learning from parents of children with cancer. J Pediatr Hematol Oncol 22 (1): 3-12, 2000 Jan-Feb.10695815
Goldbeck L: Parental coping with the diagnosis of childhood cancer: gender effects, dissimilarity within couples, and quality of life. Psychooncology 10 (4): 325-35, 2001 Jul-Aug.11462231
Kazak AE, Boeving CA, Alderfer MA, et al.: Posttraumatic stress symptoms during treatment in parents of children with cancer. J Clin Oncol 23 (30): 7405-10, 2005.16157936
Norberg AL, Lindblad F, Boman KK: Parental traumatic stress during and after paediatric cancer treatment. Acta Oncol 44 (4): 382-8, 2005.16120547
Boman KK, Viksten J, Kogner P, et al.: Serious illness in childhood: the different threats of cancer and diabetes from a parent perspective. J Pediatr 145 (3): 373-9, 2004.15343194
Young B, Dixon-Woods M, Windridge KC, et al.: Managing communication with young people who have a potentially life threatening chronic illness: qualitative study of patients and parents. BMJ 326 (7384): 305, 2003.12574042
Noll RB, Gartstein MA, Hawkins A, et al.: Comparing parental distress for families with children who have cancer and matched comparison families without children with cancer. Fam Syst Med 13 (1): 11-27, 1995.
Rourke MT, Stuber ML, Hobbie WL, et al.: Posttraumatic stress disorder: understanding the psychosocial impact of surviving childhood cancer into young adulthood. J Pediatr Oncol Nurs 16 (3): 126-35, 1999.10444940 99373966
Kazak AE, Barakat LP: Brief report: parenting stress and quality of life during treatment for childhood leukemia predicts child and parent adjustment after treatment ends. J Pediatr Psychol 22 (5): 749-58, 1997.9383934
Grootenhuis MA, Last BF: Predictors of parental emotional adjustment to childhood cancer. Psychooncology 6 (2): 115-28, 1997.9205969
Dockerty JD, Williams SM, McGee R, et al.: Impact of childhood cancer on the mental health of parents. Med Pediatr Oncol 35 (5): 475-83, 2000.11070480
Santacroce S: Uncertainty, anxiety, and symptoms of posttraumatic stress in parents of children recently diagnosed with cancer. J Pediatr Oncol Nurs 19 (3): 104-11, 2002 May-Jun.12066262
Steele RG, Long A, Reddy KA, et al.: Changes in maternal distress and child-rearing strategies across treatment for pediatric cancer. J Pediatr Psychol 28 (7): 447-52, 2003 Oct-Nov.12968036
Hoekstra-Weebers JE, Jaspers JP, Kamps WA, et al.: Psychological adaptation and social support of parents of pediatric cancer patients: a prospective longitudinal study. J Pediatr Psychol 26 (4): 225-35, 2001.11329482
Yeh CH, Lin CF, Tsai JL, et al.: Determinants of parental decisions on 'drop out' from cancer treatment for childhood cancer patients. J Adv Nurs 30 (1): 193-9, 1999.10403996
Van Dongen-Melman JE, Pruyn JF, De Groot A, et al.: Late psychosocial consequences for parents of children who survived cancer. J Pediatr Psychol 20 (5): 567-86, 1995.7500231
Brown RT, Madan-Swain A, Lambert R: Posttraumatic stress symptoms in adolescent survivors of childhood cancer and their mothers. J Trauma Stress 16 (4): 309-18, 2003.12895012
Kazak AE, Alderfer M, Rourke MT, et al.: Posttraumatic stress disorder (PTSD) and posttraumatic stress symptoms (PTSS) in families of adolescent childhood cancer survivors. J Pediatr Psychol 29 (3): 211-9, 2004 Apr-May.15131138
Hamama R, Ronen T, Feigin R: Self-control, anxiety, and loneliness in siblings of children with cancer. Soc Work Health Care 31 (1): 63-83, 2000.10989875
Alderfer MA, Labay LE, Kazak AE: Brief report: does posttraumatic stress apply to siblings of childhood cancer survivors? J Pediatr Psychol 28 (4): 281-6, 2003.12730285
Sargent JR, Sahler OJ, Roghmann KJ, et al.: Sibling adaptation to childhood cancer collaborative study: siblings' perceptions of the cancer experience. J Pediatr Psychol 20 (2): 151-64, 1995.7760216
MacLeod KD, Whitsett SF, Mash EJ, et al.: Pediatric sibling donors of successful and unsuccessful hematopoietic stem cell transplants (HSCT): a qualitative study of their psychosocial experience. J Pediatr Psychol 28 (4): 223-30, 2003.12730279
Packman W: Psychosocial impact of pediatric BMT on siblings. Bone Marrow Transplant 24 (7): 701-6, 1999.10516671
Houtzager BA, Grootenhuis MA, Last BF: Supportive groups for siblings of pediatric oncology patients: impact on anxiety. Psychooncology 10 (4): 315-24, 2001 Jul-Aug.11462230
Murray JS: Self-concept of siblings of children with cancer. Issues Compr Pediatr Nurs 24 (2): 85-94, 2001 Apr-Jun.11817430

## End of Life

Despite significant improvements in long-term, disease-free survival in children treated for cancer,[1] cancer is the leading disease-related cause of death for children in the United States.[2] For more than half of children for whom frontline treatment fails, treatment using relapse and disease recurrence clinical trials (phase I and phase II) and unrelated hematopoietic stem cell transplantation is common.[3] For children, this strategy is sometimes effective in providing prolonged remissions with patient-valued quality of life.[4] For these reasons, many children treated for cancer in the United States and around the world die in inpatient settings while receiving active cancer treatment.[5] Clinical practice and experience is the driving force in this field; unfortunately, very few empirical studies have been published to guide practice.

### Considering End-of-Life Issues

Planning for a child’s death is often a very uncomfortable topic for parents, other family members, and members of the health care team. Children are not supposed to die. Although there has been a significant emphasis on better understanding the decision-making process and the care provided for children at the end of life,[6] many parents choose to continue active cancer treatment until death.

One hundred forty-one parents who had lost a child to cancer were asked whether their children benefited or suffered from treatment with no realistic expectation of success. Thirty-eight percent of the parents indicated that their children continued to receive cancer-directed therapy, even after the parents recognized that there was no realistic chance of success. Sixty-one percent of these reported that their child experienced some suffering, and 57% reported little or no benefit from the continued treatment. Despite these experiences, 57% reported that they would recommend standard chemotherapy during the end-of-life phase, and 33% would recommend experimental (phase I and phase II) treatment. Parents who felt that their child suffered at the end of life were less likely to recommend additional chemotherapy. However, even those who did not personally support using standard chemotherapy at the end of life (91%) felt that physicians should offer this as an option.[7]

Parent and physician perspectives on quality of care at the end of life do not always match. Parents of children who died from cancer reported focusing primarily on relationship issues, with higher ratings for physician care when oncologists:[8]

- Provided clear information.
- Communicated with care and sensitivity.
- Communicated directly with the child when appropriate.
- Prepared parents for the circumstances around the child’s impending death.

Oncologists based care ratings on biomedical measures such as lower ratings of pain by parents and fewer days of hospitalization.

### Support for End-of-Life Care

Resources to support palliative care and end-of-life care for children treated for cancer are often quite limited. A survey of member institutions of the Children’s Oncology Group (81% response rate) found that only 58% had a pediatric palliative care team available to families,[9] although the following related services were available:

- Pain service, 90%.
- Hospice, 60%.
- Psychosocial support team, 80%.
- Bereavement program, 59%.

Complementary and alternative medicine services were available in 39% of institutions and in 95% of communities served by the institutions. Support for other family members, particularly siblings, is often missing from these programs.[5]

#### Hospice care

Referrals to hospice care are often limited by hospice policies that do not accept patients still receiving active chemotherapy. Twelve hundred pediatric oncologists in the Children’s Oncology Group were surveyed about hospice referral practices (67% response rate). Hospice referrals were limited by lack of access to inpatient hospice programs. However, pediatric oncologists indicated that if the hospice program accepted children still receiving chemotherapy, referrals were more likely and the children were also more likely to die at home than in hospitals.[10]

#### Complementary and alternative therapies

Despite broad popular interest in complementary and alternative therapies, few children are offered access to this treatment. A study of Children’s Oncology Group institutions in Canada found that complementary and alternative therapies were offered at only 18% of treating institutions, although these were available in 94% of communities. Direct referrals were only provided to 6% of families, and only 20% of institutions had developed any guidelines for the use of complementary and alternative therapies.[11] To address this issue, studies are in progress to examine the integration of complementary and alternative therapies with conventional treatment in the Children’s Oncology Group.[12]

#### Personal discussions

Despite the relative absence of structured palliative care and end-of-life care for children treated for cancer, personal discussions about palliation and end-of-life care between oncologists and parents nevertheless take place. A study of 140 parents whose children died of cancer found that if the primary oncologist discussed options and if home health support were available, 88% of parents planned how they wanted their child’s end-of-life care to be provided, and 97% accomplished their plan. This was associated with more home deaths (72% vs. 8% who did not plan); fewer hospital admissions (54% vs. 98%); parents feeling more prepared (37% vs. 12%) and comfortable with the process (84% vs. 40%); and, for those who died in the hospital, fewer deaths in the intensive care unit (92% vs. 33%) and with intubation (21% vs. 48%).[13]

### Strategies for Improving End-of-Life Care

Care of children at the end of their lives is complex. A comprehensive summary of pediatric palliative care has highlighted the following general issues that need to be considered:[14]

- Communication (verbal and nonverbal) with children and families should be caring, sensitive to individual and family concerns, and provided within the context of a child’s age and developmental level.
- Palliative care should specifically include strategies for assessing and managing pain and other symptoms associated with the end of life. Medications and other supportive care interventions should be provided for pain, agitation, pruritus, nausea and vomiting, seizures, and secretions. For children for whom bleeding is a disturbing end-of-life consequence, platelet transfusions may also be appropriate.
- The emotional and spiritual needs of families and children should be identified and addressed. Families are composed of individuals, and there are usually variations in how individual family members cope with impending death; cultural beliefs and practices may also influence this process. Being aware of factors that contribute to this variation and tailoring interventions to individual families are important aspects of end-of-life care.
- Structured support for bereavement care should be provided. Some institutions support bereavement teams who provide families with items such as handprints of the child, photo albums, and quilts to facilitate transition at the time of the child’s death. Other institutions provide parents with information about what may occur at the time of death and common experiences of family members in the hours, days, weeks, and months following the death. Some also provide one to three sessions of bereavement support for family members after the child’s death. (Refer to the PDQ summary on Grief, Bereavement, and Coping With Loss for more information.)
- Parents should be engaged in early discussion about advance care planning. It has been suggested that this discussion begin at the time of diagnosis for all children who have a survival prognosis lower than 50%, although others prefer to delay this discussion until the time of relapse or disease progression. Advanced care planning includes discussion about the use of standard or experimental treatments, preferred location for the child’s death, whether to involve hospice, funeral arrangements, and whether a Do Not Resuscitate (DNR) order is to be implemented in inpatient and outpatient settings. Depending on their developmental and cognitive capacities, some children who are dying benefit from being included in these advance care decisions.

### Other Issues

Many aspects of end-of-life care for adults and children with cancer overlap. At the same time, specific developmental, family, and even legal issues are unique to children and require careful consideration. State laws related to withdrawal or withholding of care vary, and end-of-life care may be affected by whether a child is in the custody of biologic parents or legal guardians or is a ward of the state. Some states do not permit DNR decisions to be made for children in their care. Health care teams have a responsibility to be aware of state laws, hospital policies, and ethical standards in their community and integrate this information into end-of-life care. Ultimately, the challenge is to balance available intervention and support with unique family, child, and physician concerns in a way that optimizes quality of life for the child and family.[15] (Refer to the PDQ summary on Last Days of Life for more information.)

### References

Linabery AM, Ross JA: Childhood and adolescent cancer survival in the US by race and ethnicity for the diagnostic period 1975-1999. Cancer 113 (9): 2575-96, 2008.18837040
Kochanek KD, Kirmeyer SE, Martin JA, et al.: Annual summary of vital statistics: 2009. Pediatrics 129 (2): 338-48, 2012.22291121
Hechler T, Blankenburg M, Friedrichsdorf SJ, et al.: Parents' perspective on symptoms, quality of life, characteristics of death and end-of-life decisions for children dying from cancer. Klin Padiatr 220 (3): 166-74, 2008 May-Jun.18478489
Berg SL, Chamberlain MC: Systemic chemotherapy, intrathecal chemotherapy, and symptom management in the treatment of leptomeningeal metastasis. Curr Oncol Rep 5 (1): 29-40, 2003.12493148
Friedrichsdorf SJ, Menke A, Brun S, et al.: Status quo of palliative care in pediatric oncology-a nationwide survey in Germany. J Pain Symptom Manage 29 (2): 156-64, 2005.15733807
Field MJ, Behrman RE, eds.: When Children Die: Improving Palliative and End-of-Life Care for Children and Their Families. Institute of Medicine, National Academies Press, 2003. Also available online (https://www.nap.edu/read/10390/chapter/1). Last accessed January 20, 2022.
Mack JW, Joffe S, Hilden JM, et al.: Parents' views of cancer-directed therapy for children with no realistic chance for cure. J Clin Oncol 26 (29): 4759-64, 2008.18779605
Mack JW, Hilden JM, Watterson J, et al.: Parent and physician perspectives on quality of care at the end of life in children with cancer. J Clin Oncol 23 (36): 9155-61, 2005.16172457
Johnston DL, Nagel K, Friedman DL, et al.: Availability and use of palliative care and end-of-life services for pediatric oncology patients. J Clin Oncol 26 (28): 4646-50, 2008.18824711
Fowler K, Poehling K, Billheimer D, et al.: Hospice referral practices for children with cancer: a survey of pediatric oncologists. J Clin Oncol 24 (7): 1099-104, 2006.16505429
Johnston DL, Nagel K, O'Halloran C, et al.: Complementary and alternative medicine in pediatric oncology: availability and institutional policies in Canada--a report from the Children's Oncology Group. Pediatr Blood Cancer 47 (7): 955-8, 2006.16411194
O'Mara A: Complementary and alternative medicine research and cooperative groups: can it happen? J Pediatr Oncol Nurs 23 (5): 258-60, 2006 Sep-Oct.16902079
Dussel V, Kreicbergs U, Hilden JM, et al.: Looking beyond where children die: determinants and effects of planning a child's location of death. J Pain Symptom Manage 37 (1): 33-43, 2009.18538973
Himelstein BP, Hilden JM, Boldt AM, et al.: Pediatric palliative care. N Engl J Med 350 (17): 1752-62, 2004.15103002
Friedman DL, Hilden JM, Powaski K: Issues and challenges in palliative care for children with cancer. Curr Pain Headache Rep 9 (4): 249-55, 2005.16004840

## Changes to This Summary (01/20/2022)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Overview

Updated statistics with 5-year survival rates for children and adolescents during the period 2011 to 2017 (cited American Cancer Society 2022 as reference 1).

This summary is written and maintained by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about supportive care issues related to treatment in children and adolescents. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Pediatric Supportive Care are:

- Tammy I. Kang, MD, MSCE, FAAHPM (Texas Children's Pavilion for Women)
- Shefali Parikh, MD (Children's Hospital of Philadelphia)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Supportive and Palliative Care Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Pediatric Supportive Care. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/childhood-cancers/pediatric-care-hp-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389208]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).